# Nutrition in Cancer Care

Patient Version

This PDQ cancer information summary has current information about nutrition before, during, and after cancer treatment. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly, and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## What is nutrition?

Nutrition is what you eat and drink and how your body uses it. Good nutrition is important for good health. A healthy diet includes a variety of foods and liquids that have nutrients (vitamins, minerals, proteins, carbohydrates, fats, and water) your body needs.

### Good nutrition for people with cancer may differ from what we think of as healthy

People with cancer often need to follow diets that are different from what we think of as healthy. For most people, a healthy diet includes lots of whole grains, fruits and vegetables, modest amounts of protein, and small amounts of sugar, alcohol, salt, and unhealthy fats.

When you have cancer, though, you may need extra protein and calories. To eat enough protein and calories, your diet may need to include more meat, fish, eggs, dairy, fats, and plant-based proteins than someone without cancer. The extra protein and calories will help you keep your strength up to deal with the side effects of treatment, prevent malnutrition, and maintain your best possible quality of life.

A registered dietitian can help make sure you get the right amount of protein and calories during and after cancer treatment. They will work with you, your family, and the rest of your medical team to help manage your diet.

Find a registered dietitian in your area. (https://www.eatright.org/find-a-nutrition-expert)

### Plan nutrition before cancer treatment

During treatment, you may be tired and not feel well. Being tired can make it harder to grocery shop, cook, and eat. Planning meals before treatment will make it easier to eat during treatment.

To plan meals and snacks before treatment, try these tips.

Shopping tips:

- Fill the refrigerator, pantry, and freezer with healthy foods, especially those high in protein and calories.
- Stock up on foods that need little or no cooking, such as frozen foods.
- Use online grocery shopping and save your list for easy reordering.
- Use delivery or shop-from-home grocery stores.

Meal prep tips:

- Keep easy-to-digest snacks (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/easy-to-digest) on hand for when you feel sick. Pretzels and crackers are good examples.
- Cook foods ahead of time and freeze them in meal-sized portions.

Tips for accepting help from others:

- Ask friends or family to help you shop and cook during treatment.
- If people offer to grocery shop for you, let them.
- Create a grocery list of items to give to friends and family.

### Effects of cancer treatment on nutrition

Both cancer and cancer treatments may cause side effects that affect your taste, smell, appetite, and ability to eat enough food or absorb the nutrients from food. This can lead to malnutrition.

People with certain cancers are more likely to have problems eating. These cancers include those that affect your digestive system directly, such as cancers of the head and neck, esophagus, stomach, pancreas, liver, or colon. But people with any type of cancer can find it hard to eat well because of the effects of cancer treatment.

When malnutrition is not managed in people having cancer treatment, it can lead to cancer cachexia. Cancer cachexia is a wasting syndrome that can cause weakness, weight loss, and fat and muscle loss. It can occur even when you are eating well.

Learn more about Weight Changes, Malnutrition, and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss) and Cancer Cachexia (https://www.cancer.gov/about-cancer/treatment/side-effects/cancer-cachexia).

#### Chemotherapy and eating problems

Chemotherapy uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. But these drugs may also kill healthy cells that grow and divide quickly, such as cells in the mouth and digestive tract. This can cause eating problems and other side effects, including:

- loss of appetite (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss)
- nausea and vomiting (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
- constipation (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
- diarrhea (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea)
- dry mouth (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- sores in the mouth or throat (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- changes in the way food tastes (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- trouble swallowing (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- feeling full after eating a small amount of food (early satiety)

If you are on chemotherapy, you may have a high risk of infection, including from food (foodborne illness). That is because chemotherapy can reduce the number of your white blood cells, which fight infection. It is important that you and your caregivers learn about how to safely prepare food and how to avoid foods that may cause infection (https://www.foodsafety.gov/people-at-risk/people-with-weakened-immune-systems).

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Hormone therapy and eating problems

Hormone therapy may be used to slow or stop cancers that rely on hormones to grow, like breast, ovarian, and prostate cancer. Hormone therapy adds, blocks, or removes these hormones. These drugs can cause weight gain and other side effects, including:

- fluid retention (edema) (https://www.cancer.gov/about-cancer/treatment/side-effects/edema)
- nausea and vomiting
- high blood sugar, also called hyperglycemia
- fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue)

Learn more about Hormone Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/hormone-therapy).

#### Immunotherapy and eating problems

Immunotherapy uses your immune system to fight cancer. The side effects of immunotherapy are different for each person and depend on the type of immunotherapy drug.

Immunotherapy may cause fatigue, which can lead to a poor appetite. Learn more about Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue).

Common nutrition-related side effects caused by immunotherapy include:

- fever
- nausea and vomiting
- diarrhea

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

#### Radiation therapy and eating problems

Radiation therapy kills cancer cells and healthy cells in the area that is being treated.

Radiation therapy to any part of your digestive system has side effects that cause eating problems. Most of the side effects begin 2 to 3 weeks after radiation therapy begins and go away a few weeks after it is finished. But some side effects can last for months or years after treatment ends. Learn more about Late Effects of Cancer Treatment (https://www.cancer.gov/about-cancer/coping/survivorship/late-effects).

Fatigue, which can lead to a poor appetite, is a common side effect of radiation therapy. Learn more about Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue).

Radiation therapy to the brain or head and neck may cause:

- loss of appetite
- nausea and vomiting
- dry mouth or thick saliva
- sore mouth and gums
- changes in the way food tastes
- trouble swallowing
- pain when swallowing
- being unable to fully open the mouth

Radiation therapy to the chest may cause:

- loss of appetite
- nausea and vomiting
- trouble swallowing
- pain when swallowing
- choking or breathing problems caused by changes in the upper esophagus

Radiation therapy to the abdomen, pelvis, or rectum may cause:

- nausea and vomiting
- bowel blockage
- inflamed colon
- diarrhea
- radiation enteritis

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy).

#### Stem cell transplant and eating problems

People who have a stem cell transplant have special nutrition needs. Medications used before or during a stem cell transplant may cause side effects that keep you from eating and digesting food as usual.

Common nutrition-related side effects caused by stem cell transplant include:

- mouth and throat sores
- diarrhea

If you have a stem cell transplant, you have a high risk of infection, including from food (foodborne illness). That is because treatment given before your transplant reduces the number of your white blood cells, which fight infection. It is important that you and your caregivers learn about how to safely prepare food and how to avoid foods that may cause infection.

After a stem cell transplant, you are also at risk of acute or chronic graft-versus-host disease (GVHD). GVHD may affect your digestive tract, skin, or liver and change your ability to eat or absorb nutrients from food.

Learn more about Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant).

#### Surgery and eating problems

Surgery is a common part of cancer treatment. Surgery that removes all or part of certain organs can affect your ability to eat and digest food. After any surgery, your body needs extra energy and nutrients to heal wounds, fight infection, and recover. If you are malnourished before surgery, you may have trouble healing.

Common nutrition-related side effects caused by surgery include:

- loss of appetite
- trouble chewing
- trouble swallowing
- feeling full after eating a small amount of food, also known as early satiety

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

#### Targeted therapy and eating problems

Targeted therapy is a type of cancer treatment that targets proteins that control how cancer cells grow, divide, and spread. It may disturb normal function of your digestive system and cause:

- constipation
- diarrhea
- nausea and vomiting
- abdominal pain

Other problems might include taste changes and a dry or sore mouth. Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Food safety during cancer treatment

Some cancer treatments can weaken your immune system. This makes it harder for you to fight infections, including foodborne illnesses. So, you need to take special care in the way you handle and prepare food during your cancer treatment. Keep foods at safe temperatures, scrub raw vegetables and fruits, and be careful to use separate utensils, plates, and cutting boards when preparing meats and produce. Learn more about food safety for people with weakened immune systems. (https://www.foodsafety.gov/people-at-risk/people-with-weakened-immune-systems)

Learn more about risk of Infection During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/infection).

### Nutrition screening and assessment during cancer treatment

If you have trouble eating and maintaining your weight, your nurse, doctor, or registered dietitian may ask you a series of questions to find out if you are malnourished or are likely to become so.

To assess your nutrition status, you may be asked about:

- weight changes
- changes in the amount of food you eat
- changes in types of food you eat
- problems with eating, like nausea or vomiting
- your ability to walk or do other daily activities

If you are at risk of poor nutrition or malnutrition, your doctor will refer you to a registered dietitian. A registered dietitian can do an assessment, which reviews your:

- food and diet history
- medication history
- personal, medical, family, and social history
- height and weight
- lab tests
- side effects of treatment
- physical exam

Based on this information, the registered dietitian will create a nutrition care plan. This plan includes ways you and your family can improve your eating and address any nutrition problems that you are having.

### Ways to manage nutrition problems caused by cancer treatments

When side effects of cancer or cancer treatment affect normal eating, there are ways to help you get the nutrients you need.

#### Ways to manage appetite loss, weight loss, and early satiety

If you have loss of appetite, weight loss, or feel full too quickly, these tips may help:

- Eat foods that are high in protein (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein) and calories (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-calories).
- Eat high-protein foods first in your meal.
- Add extra protein and calories to food.
- Drink most of your fluids between meals, not during meals. Small sips at mealtime are okay.
- Drink milkshakes, smoothies, juices, or soups if you do not feel like eating solid foods.
- Eat foods that smell good.
- Try new foods and new recipes.
- Use a blender to make high-calorie, high-protein drinks.
- Try nutrition supplements, such as Ensure or Boost.
- Aim to eat smaller meals and snacks five to six times a day.
- Eat your largest meal when your appetite is strongest, whether that’s breakfast, lunch, or dinner.
- Make and store small amounts of your favorite foods so they are ready to eat when you are hungry.
- Find a physical activity you enjoy and will stick with to help increase your appetite.

If you continue to struggle to eat and keep up your weight, you and your treatment team can discuss other nutrition support options. These options may include tube feeding or IV nutrition (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition#types-of-nutrition-support-if-you-cannot-eat).

You may also take medicines that increase appetite. Learn more about Weight Changes, Malnutrition, and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss).

#### Ways to manage nausea and vomiting

Nausea is when you feel sick to your stomach, as if you have the urge to throw up. Vomiting is when you throw up. Nausea and vomiting are common side effects of cancer treatments, including chemotherapy and radiation therapy. But there are medicines that often prevent or relieve nausea and vomiting before they start or become a problem.

When you vomit, you may become dehydrated and lose a lot of electrolytes. Electrolytes are minerals, such as potassium, sodium, and calcium that help balance body fluids and support your heart, nerve, and muscle functions. Talk to your dietitian about which drinks can help prevent dehydration and how much you should drink.

Learn more about Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting).

#### Ways to manage dry mouth

Dry mouth occurs when you have less saliva than you used to. Having less saliva can make it harder to talk, chew, and swallow food. Dry mouth can also change the way food tastes.

Chemotherapy and radiation therapy to the head or neck can damage the glands that make saliva. Immunotherapy and some medicines can also cause dry mouth.

If you have dry mouth:

- Moisten food with sauce, salsa, gravy, or salad dressing.
- Eat foods that are easy to swallow (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/easy-chew-swallow).
- Try eating foods and drinks that are very sweet or tart, such as lemonade, to help make more saliva.
- Chew sugar-free gum or suck on sugar-free hard candy, ice pops, or ice chips.
- Sip water throughout the day.
- Drink 8 or more cups of water each day.
- Swish and spit with carbonated beverages to remove dry or thick saliva.
- Keep your lips moist with lip balm.
- Floss your teeth every day.
- Ask your doctor about special mouthwashes for dry mouth.
- Do not:
  - use tobacco products
  - inhale secondhand smoke
  - use electronic cigarettes
  - drink any type of alcohol
  - eat foods that hurt your mouth (such as spicy, sour, salty, hard, or crunchy foods)

Talk with your doctor or dentist about using artificial saliva or a similar product to coat, protect, and moisten your mouth and throat.

Learn about mouth and throat problems caused by cancer treatments. (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)

#### Ways to manage mouth sores

Cancer treatments can harm fast-growing cells in your mouth. Radiation therapy to the head or neck, chemotherapy, and immunotherapy can cause mouth sores (little cuts or ulcers in your mouth) and tender gums. Dental problems or mouth infections, such as thrush, can also make your mouth sore. Visit a dentist at least 2 weeks before starting immunotherapy, chemotherapy, or radiation therapy to the head and neck.

Your mouth and gums will most likely feel better once cancer treatment ends.

If you have mouth sores:

- Eat soft foods that are easy to chew (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/easy-chew-swallow).
- Cook foods until soft and tender.
- Cut food into small pieces.
- Use a blender or food processor to make food smooth.
- Suck on ice chips to numb and soothe your mouth.
- Eat foods cold or at room temperature. Hot foods can hurt your mouth.
- Drink with a straw to move liquid past the painful parts of your mouth.
- Use a small spoon to help you take smaller bites, which are easier to chew.
- Check your mouth each day for sores, white patches, or puffy and red areas.
- Rinse your mouth three to four times a day. Mix ¼ teaspoon baking soda, ⅛ teaspoon salt, and 1 cup warm water for a mouth rinse.
- Talk to your doctor about medicine to numb your mouth. This may make eating easier.
- Avoid:
  - citrus fruits, such as oranges, lemons, and limes
  - spicy foods
  - tomatoes and ketchup
  - salty foods
  - raw vegetables
  - sharp and crunchy foods
  - drinks with alcohol
  - mouthwash that contains alcohol
  - tobacco products
  - electronic cigarettes
  - toothpicks or sharp objects

#### Ways to manage sore throat and trouble swallowing

Chemotherapy and radiation therapy to the head and neck can make the lining of your throat inflamed and sore, a problem called esophagitis. It may feel as if you have a lump in your throat or that your chest or throat is burning. You may also have trouble swallowing. These problems may make it hard to eat and cause weight loss.

Some types of chemotherapy and radiation to the head and neck can harm fast-growing cells, such as those in the lining of your throat. Your risk of sore throat, trouble swallowing, or other throat problems depends on:

- how much radiation you are getting
- if you are getting chemotherapy and radiation therapy at the same time
- whether you use tobacco or drink alcohol during cancer treatment

If you have a sore throat or trouble swallowing:

- Eat soft foods that are easy to chew and swallow (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/easy-chew-swallow).
- Moisten food with gravy, sauces, broth, or yogurt.
- Cook foods until soft and tender.
- Cut food into small pieces.
- Use a blender or food processor to make food smooth.
- Eat five or six small meals every day instead of three large meals.
- Eat foods and drinks that are high in protein (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein) and calories (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-calories).
- Sit upright and bend your head slightly forward when you eat or drink. Stay upright for at least 30 minutes after eating.
- Do not use tobacco or electronic cigarettes.
- Stay away from the foods and drinks that can burn or scratch your throat, such as:
  - hot foods and drinks
  - spicy foods
  - foods and juices that are high in acid, such as citrus, pineapple, and tomatoes
  - sharp or crunchy foods
  - drinks with alcohol
  - carbonated drinks

Talk to your doctor about tube feedings if you cannot eat enough to stay strong.

#### Ways to manage taste and smell changes

Cancer treatment, dental problems, or the cancer itself can cause changes in your sense of taste or smell. Food may have less taste or certain foods (like meat) may be bitter or taste like metal. Sometimes, foods that used to smell good to you no longer do.

Although there is no way to prevent these problems, there are things you can do to manage them. And often they get better after treatment ends.

Ways to manage a salty taste:

- Try low-sodium or sodium-free seasoning products, like Mrs. Dash.
- Use herbs, spices, and seasonings in place of salt when cooking.
- Pick naturally sweet foods, like fresh or dried fruit.
- Avoid eating out or getting take-out because restaurants often prepare foods with a lot of salt.
- Boil food, as this reduces salty flavors.
- Add a pinch of sugar or honey to foods.

Ways to manage an overly sweet taste:

- Eat more vegetables.
- Add water and ice to dilute sweet juices. Try mixing half juice and half water.
- Eat sour foods, like grapefruit.
- Add a pinch of salt to food to offset the sweetness.
- Add vinegar or citrus to foods to reduce sweetness.

Ways to manage a loss of taste or “off” taste:

- Choose fresh produce.
- Try foods with fruity, tart, or salty flavors.
- Use marinades on meats to add flavor. Marinate the meat in your refrigerator overnight for more flavor.
- Add vinegars, fresh fruit juices, cheese, salad dressing, and sauces to foods.
- Add fresh or dried herbs, like basil, oregano, thyme, rosemary, mint, or sage.
- Add spices, like onion and garlic powder, paprika, ground turmeric, ground ginger, or curry powder.
- Add condiments, like mayonnaise, relish, ketchup, mustard, or salsa.
- Chew food longer to allow more contact with taste buds.

Ways to manage bitter and metallic tastes:

- Use plastic, silicone, wooden, or bamboo silverware.
- Suck or chew on sugar-free candies, mints, or gum.
- Do not buy prepackaged food in metal containers, such as canned beans. Look for cardboard, glass, or plastic packaging.
- Do not drink from metal containers or use metal silverware.
- Try plant-based protein sources, like tofu, nuts, or beans.
- If red meat tastes metallic, try chicken, turkey, or dairy foods.
- Find nonmeat, high-protein recipes in vegetarian, Chinese, or Indian cookbooks.
- Drink sweet or sour beverages, like cherry, cranberry, pineapple, or grape juice.
- Eat fresh and dried fruits, like mango, peaches, watermelon, dates, or figs.
- Add sweetness to foods with a pinch of sugar, honey, or maple syrup.

Ways to manage smell changes:

- Keep foods covered until ready to eat.
- Drink from cups with lids and drink through a straw.
- Turn a kitchen fan on when cooking, or cook outdoors if smells bother you.
- Avoid strong odors, such as brussels sprouts or fish.
- Make or eat foods that don’t need to be cooked, such as:
  - protein shakes
  - protein bars
  - smoothies
  - cereal with fruit and milk
  - pudding
  - Greek yogurt parfaits
  - sandwiches

### Types of nutrition support if you cannot eat

Sometimes, despite your best efforts, you may not be able to eat enough to stay strong. If this happens, nutrition support through a feeding tube may be a good option. Nutrition support helps if you cannot eat or digest enough food to stay nourished. Staying nourished helps increase the chance of receiving treatment without unplanned breaks.

Your doctor or dietitian will discuss nutrition support with you if they think it will help.

There are two types of nutrition support, enteral and parenteral nutrition.

#### Enteral nutrition

Enteral nutrition gives you nutrients in liquid form through a tube that is placed into the stomach or small intestine. There are two types of feeding tubes:

- A nasogastric tube is inserted through the nose and down the throat into the stomach or small intestine. This is used when nutrition support is needed for only a few weeks.
- A gastrostomy tube is inserted into the stomach, or a jejunostomy tube is inserted into the small intestine through an opening made on the outside of the abdomen. Feeding tubes of this type are usually used for long-term enteral feeding or for people who cannot use a tube in the nose and throat.

The type of formula used is based on your specific nutritional needs. There are formulas for people with special health conditions, such as diabetes, or with other needs, such as observing religious or cultural norms.

Some people can still eat by mouth when using enteral nutrition. Before doing so, it is important to ask your doctor if it is safe for you.

#### Parenteral nutrition

Parenteral nutrition is used when you cannot take food by mouth or use a feeding tube. Parenteral feeding does not use the stomach or intestines to digest food. Nutrients are given to you directly into the blood through a catheter inserted into a vein. These nutrients include proteins, fats, vitamins, and minerals.

As with enteral feeding, some people can eat by mouth when using parenteral nutrition. Ask your doctor if it is safe to eat by mouth while receiving parenteral nutrition.

The catheter may be placed into a vein in the chest or in the arm.

A central venous catheter is placed beneath your skin and into a large vein in the upper chest. The catheter is put in place by a surgeon. This type of catheter is used for long-term parenteral feeding.

A central venous catheter is a thin, flexible tube that is inserted into a vein, usually below the right collarbone, and guided into a large vein above the right side of the heart called the superior vena cava.

Central venous catheter; drawing of a central venous catheter that goes from a vein below the right collarbone to a large vein above the right side of the heart called the superior vena cava. An inset shows a central venous catheter in the right side of the chest with a clear plastic dressing over it.

A peripheral venous catheter is placed into your vein in the arm. A peripheral venous catheter is put in place by trained medical staff. This type of catheter is usually used for short-term parenteral feeding or if you do not have a central venous catheter.

A peripheral venous catheter is a thin, flexible tube that is inserted into a vein. It is usually inserted into the lower part of the arm or the back of the hand.

Peripheral venous catheter; drawing of a peripheral venous catheter in a vein in the lower part of the arm with the catheter tubing clamped and capped off at the end.

You will be checked often for infection or bleeding at the place where the catheter enters the body.

### Nutrition therapy for the end of life

If you are nearing the end of life, the goal is to provide the best possible quality of life and control symptoms that cause discomfort. Your nutrition goals will be specific to you.

Common symptoms that can occur at the end of life include:

- loss of appetite (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss)
- dry mouth (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- swallowing problems (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- nausea and vomiting (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)

The focus is on relieving these symptoms, rather than getting enough nutrients.

#### You and your family can decide how much nutrition and fluids you will be given at the end of life

People at the end of life often do not feel much hunger at all and may want very little food. Sips of water, ice chips, and mouth care can help with thirst. Food and fluids should not be forced on someone who is at the end of life. Doing so can cause discomfort or choking.

You and your loved ones have the right to make informed decisions. Your religious and cultural preferences may affect your decisions. The health care team and a registered dietitian can explain nutrition needs and the benefits and risks of using tube feeding or IV nutrition at the end of life.

Possible benefits of nutrition support for people expected to live longer than a month include:

- improved quality of life
- less risk of death due to malnutrition
- fewer physical and mental problems

The risks of nutrition support at the end of life include:

- bacteria or toxins in the blood or tissues (known as sepsis) with the use of parenteral nutrition
- accidental breathing in of food or fluid into the lungs (known as aspiration) with the use of enteral nutrition
- sores and breakdown of the skin where the enteral feeding tube is inserted
- diarrhea with the use of enteral and parenteral nutrition
- problems caused by too much fluid in the blood with the use of enteral and parenteral nutrition

Learn more about nutrition support and what to expect during the last days of life. (https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/planning/last-days-pdq)

## Appetite loss, weight loss, and cancer

Appetite loss and weight loss are common side effects of cancer and cancer treatments. Anyone with cancer might lose their appetite and lose weight. But you are more likely to lose weight if you have head and neck, lung, pancreatic, or liver cancer or cancer in the upper digestive system. Upper digestive system cancers include cancers in the throat, esophagus, stomach, and the first part of the small intestine.

Appetite loss often leads to eating less than your body needs, which leads to weight loss. Weight loss can also occur when you burn more calories than you are taking in. Weight loss can lead to malnutrition (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss#malnutrition-and-cancer).

Although cachexia also causes weight loss, cachexia and weight loss are different and treated differently. Learn more at Cancer Cachexia (https://www.cancer.gov/about-cancer/treatment/side-effects/cancer-cachexia).

Side effects of cancer treatment that cause problems with eating include:

- nausea and vomiting (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
- diarrhea (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea)
- constipation (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
- feeling full quickly (early satiety)
- painful swallowing (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- mouth sores (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- dry mouth (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- taste changes (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)

Other factors that may cause appetite loss and weight loss during cancer treatment include anxiety, pain (https://www.cancer.gov/about-cancer/treatment/side-effects/pain), depression, and fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue). Learn more about Emotions and Cancer (https://www.cancer.gov/about-cancer/coping/feelings).

### Ways to manage appetite loss and weight loss in people with cancer

If you start to lose your appetite, talk with your doctor or registered dietitian. Speak with them right away if you start to lose weight. Your dietitian can help you and your family manage your weight loss. Here are some tips that may help.

Tips about foods to eat:

- Eat foods high in protein (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein) and calories (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-calories).
- Add whole milk to hot or cold cereal.
- Eat foods that smell good.
- Try new foods and recipes.

Tips on when to eat:

- Eat small meals every 2 to 3 hours, about 5 or 6 meals per day.
- If you forget it’s time to eat, set an alarm to remind yourself.
- Eat within 1 hour of waking up.
- Eat high-protein foods (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein) first in your meal when your appetite is strongest.
- Use TV shows, commercial breaks, or radio ads to remember to eat or drink.
- Eat a bedtime snack.

Tips about when and what to drink:

- Drink liquids (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/clear-liquids) between meals to help you stay hydrated.
- During meals, sip only small amounts of fluids so you can eat more food.
- Drink milkshakes, smoothies, juices, or soups if you do not feel like eating solid foods.
- Use whole milk or yogurt for milkshakes or smoothies to increase calories.
- Sip on nutrition supplement drinks between meals. Examples include Ensure and Boost.

Meal prep tips:

- Make and store small amounts of your favorite foods so they are ready to eat.
- Add full-fat cheese to toast, eggs, crackers, soups, pasta, and potatoes.
- Add creamy sauces to pasta and other dishes.
- Add leftover meat to eggs, salad, pasta, and soups.
- Add beans and lentils to soup, salad, pasta, tacos, and casseroles.
- Add high-calorie foods (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-calories) to snacks and meals.
- Add higher calorie condiments to meals and snacks.

Other tips to help improve eating:

- Be as active as possible so that you will have a good appetite.
- Brush your teeth and rinse your mouth to relieve symptoms and aftertaste.
- Create a relaxing eating environment. Try adding candles and music and eating with your loved ones.

### Medicine to manage appetite loss from cancer and cancer treatment

If you are not able to keep your appetite up, talk with your doctor about appetite stimulants. These are medicines that increase appetite and can cause weight gain.

### Increased appetite, weight gain, and cancer

Although many people with cancer have appetite loss and lose weight, you may gain weight during cancer treatment.

Weight gain is more common if you have ovarian, breast, or prostate cancer. Each person is different, so even if you have one of these cancers, it does not mean you will gain weight. And you may gain weight if you have a different type of cancer.

If you gain weight during your cancer treatment, let your doctor know so they can assess the cause and type of weight gain. Small weight fluctuations during cancer treatment are normal and expected. But if weight gain is sudden, such as 5 pounds in a week, or does not stop, tell your doctor right away.

#### Causes of weight gain in people with cancer

Fluid retention. Some cancers may cause weight gain due to the size of the tumor or the buildup of fluid. There are different types of fluid buildup, but they all can cause you to gain weight. Learn more at Edema (Swelling) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/edema).

Increased appetite. Increased appetite and food cravings that result in weight gain may occur from the cancer itself, cancer treatment, or medicines used with cancer treatment.

Metabolic changes. Hormone therapy may cause weight gain by lowering sex hormones. When you have lower levels of sex hormones, your metabolism slows. Our metabolism is the rate at which we burn energy. A slower metabolism means you burn less energy, which makes it easier to gain weight.

Some hormone therapies and chemotherapy may lead to early menopause in women. Early menopause may decrease your metabolism and cause weight gain.

Medications. Steroids, which are often given during cancer treatment, increase appetite and make you want to eat more. When we eat more calories than our body burns, we gain weight. If you take steroids, try to eat foods high in fiber (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/high-fiber-foods) and protein (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein) at each meal to help you stay full.

Steroids may also cause weight gain by causing your body to hold onto water (fluid retention). If you retain water, you may look and feel swollen. Learn more about fluid retention at Edema (Swelling) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/edema).

Decreased activity. Many cancer treatments can cause fatigue and pain, making it hard to be active. Being less active may in turn lead to weight gain. Talk to your doctor about how to manage problems like fatigue or pain to stay as active as possible. Learn more at Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue) and Pain and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain).

#### Ways to manage increased appetite and weight gain in people with cancer

Here are some tips to manage increased appetite and slow or stop weight gain. Talk with your doctor or dietitian about these tips and which ones are right for you.

Tips about foods to eat:

- Eat foods high in fiber, (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/high-fiber-foods) such as fruits, vegetables, and whole-grain breads, cereals, and pasta.
- Eat fish, lean meats, such as lean beef, pork trimmed of fat, and poultry (chicken or turkey) without skin.
- Eat plant-based proteins, such as beans, nuts, seeds, and tofu.
- Eat low-fat dairy products, such as 1% and skim.
- Eat foods that you enjoy so you feel satisfied.

Tips about foods to limit:

- Eat less fat.
- Cook with and use less salt to reduce fluid retention.
- Reduce sugary drinks like fruit juices and soda. Try diluting fruit juice with water.
- Limit or do not drink alcohol.

Grocery shopping tips:

- Buy ground meat that is 93% lean or higher.
- Buy leaner cuts of meat, such as “loin,” “sirloin,” or “round.”
- To help control portions, buy food in single-serving containers, such as single-serve yogurts.

Meal prep tips:

- Limit cooking oils. As a general guideline, use 1 teaspoon if cooking for yourself. Use 1 to 2 tablespoons if cooking for more than just yourself.
- Use cooking methods that reduce fat, like baking, broiling, air frying, roasting, and boiling.

Other ways to help with weight gain:

- Plan meals and snacks ahead of time.
- Keep your pantry and refrigerator stocked with healthy snacks.
- Eat only when hungry.
- Find activities you enjoy, if you eat out of boredom.
- Eat more slowly. It takes about 15 minutes for the stomach and brain to know if you are full. Slowing down when you are eating can help you know if you are full or not.
- Eat smaller amounts of food at meals. Use smaller plates.
- Exercise daily.
- Keep a food diary. This can help you see what foods and drinks you eat that help you to manage your weight.

If you have swelling from steroids, try limiting or avoiding foods that are high in sodium, such as:

- breads that have a long shelf life
- sauces
- dressings
- cheese
- deli and canned meats
- olives
- certain frozen foods, such as pizza and frozen dinners
- canned foods (look for low-sodium options)
- table salt
- seasonings with salt

If you don’t want to cut out these foods, look for lower sodium options. You can look at the front of a product to see if it says, “low sodium,” “very low sodium,” or “sodium free.”

Instead of using the saltshaker, use dried or fresh spices like garlic and onion powder or fresh basil and oregano.

Talk with your doctor and dietitian before going on a diet to lose weight. If you eat because of stress, fear, or depression, think about talking with a counselor. Your doctor might also prescribe medicine to help with these feelings. Learn more about Emotions and Cancer (https://www.cancer.gov/about-cancer/coping/feelings).

### Malnutrition and cancer

Malnutrition is when your body doesn’t get enough energy, protein, vitamins, and minerals.

#### Causes of malnutrition in cancer

Malnutrition can be caused by the cancer itself, the side effects of cancer treatment, or both.

Cancer and its treatment can cause malnutrition in many ways. They can decrease your appetite, make you feel full quickly, and change your sense of taste and smell. These changes may cause you to eat less. In fact, decreased appetite or appetite loss is a main cause of malnutrition in people with cancer. Cancer may also lead to malnutrition by causing problems with swallowing, digestion, and absorption of your food.

Common treatment side effects that increase the risk of malnutrition are:

- appetite loss
- dry mouth (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- mouth sores (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- feeling full quickly
- taste changes (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
- problems swallowing (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)

Cancer and cancer treatments may also cause fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue), pain (https://www.cancer.gov/about-cancer/treatment/side-effects/pain), anxiety, distress, and depression (https://www.cancer.gov/about-cancer/coping/feelings), all of which can make eating a challenge, both physically and emotionally. Talk to your doctor and registered dietitian about any of your side effects and concerns. Your team is there to support you and help you manage these challenges.

#### Problems caused by malnutrition

Malnutrition can cause you to be weak, tired, and not able to fight infection or even finish cancer treatment. Studies show that malnutrition can decrease your quality of life and become life-threatening.

#### Screening for malnutrition

Your health care team may use nutrition screenings and assessments to catch eating problems early and measure your risk of malnutrition. Ask your doctor about a nutrition screening before treatment starts and when you should be screened again during treatment.

#### Ways to prevent malnutrition

Here are tips to prevent malnutrition.

Tips on what to eat:

- Eat foods high in calories (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-calories) and protein (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition/add-protein).
- Use nutrition supplement drinks, such as Ensure or Boost.

Tips on when to eat:

- Eat small meals spaced throughout the day. Aim for five to six small meals each day.
- Eat every 2 to 3 hours.

Tips on talking with your doctor or dietitian:

- Report loss of appetite and other eating problems to your doctor right away.
- Ask your doctor about a referral to a registered dietitian. A registered dietitian can do a nutrition assessment and provide a nutrition care plan.
- Ask your dietitian about high-calorie and high-protein nutrition supplement drinks.
- Report weight loss of more than 3 to 5 pounds in one week to your doctor.

If you continue to have trouble eating and are losing weight, your doctor or dietitian might suggest tube feeding (enteral nutrition) or IV nutrition (parenteral nutrition). Learn more about tube feeding and IV nutrition at Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).

### Getting support for weight changes and malnutrition

Support from family and friends. Ask your family and friends to help with meal planning, grocery shopping, cooking, and cleaning. Provide them with a list of your favorite foods and meals they can prepare for you.

Support from your health care providers. If you’re having trouble with eating and drinking, your doctor and dietitian can help. Your doctor can help you find medicines to manage certain problems and refer you to a registered dietitian. Your registered dietitian is your nutrition expert. They can help you with eating and drinking habits before, during, and after treatment.

Support for caregivers. Do not be surprised or upset if your loved one’s food preferences change from day to day. There may be days when they do not want a favorite food or say it now tastes bad. Offer gentle support rather than pushing your loved one to eat. Talk with your loved one about ways to manage eating problems. Ask the doctor for a referral to a dietitian and meet with them together. Talk through problems and seek other advice that can help you both feel more in control. Learn more about getting support when your loved one is being treated for cancer at Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support).

### Related resources

- Eating Hints: Before, during, and after Cancer Treatment (https://www.cancer.gov/publications/patient-education/eating-hints)
- Side Effects of Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects)

## What is cancer cachexia?

Cancer cachexia is a wasting syndrome that leads to weakness, fatigue, and loss of skeletal muscle (also called sarcopenia) and fat. Unlike malnutrition, it cannot be reversed with nutrition support alone. Cancer cachexia must be treated with medicines and is hard to reverse once it starts. Cancer cachexia is most common in people with advanced cancer.

There are three stages of cancer cachexia:

- Pre-cachexia. In this stage, you may have appetite loss and weight loss. Treatments for cachexia are most likely to be effective at this stage. Your doctor and dietitian will discuss how to improve your symptoms or prevent them from getting worse.
- Cachexia. You may move from pre-cachexia to cachexia depending on the type and stage of your cancer, how you respond to cancer treatment, and your eating habits. In the cachexia stage, you may lose interest in eating and continue to lose weight and muscle. Other symptoms include fatigue and reduced strength.
- Refractory cachexia. In this stage, you have severe muscle loss and continue to lose weight. Refractory cachexia affects many people with advanced cancer that is not responding to cancer treatment.

### What causes cancer cachexia?

Scientists don’t fully understand how cachexia occurs in people with cancer. But they think that inflammation is the main cause. Increased metabolism, insulin resistance, and hormone changes may also play roles.

#### Inflammation

Inflammation can cause appetite loss, loss of muscle and fat, changes in how the body uses nutrients, decreased eating, and increased metabolism. Lab tests show that certain cancers, such as breast, ovarian, and esophageal cancer, can cause inflammation in the body.

#### Changes in metabolism

Some cancers can change your metabolism, or how your body uses carbohydrates, protein, and fat from food. Changes may include rapid breakdown of protein and fat stores in the body, causing muscle and fat loss. An increased metabolism also means your body uses more energy. This makes it harder for your body to meet its energy and protein needs, leading to weight loss and possible cachexia.

Not all people with cancer have an increased metabolism. But it is common in those with head and neck, lung, and pancreatic cancers and cancers of the upper digestive tract.

#### Insulin resistance

People with cancer may have insulin resistance. Normally, after you eat food, insulin tells your cells to allow glucose (sugar) to move from your blood into your cells. But with insulin resistance, the cells no longer respond to insulin. When your cells can’t respond to insulin, glucose can’t enter your cells and it builds up in your blood, causing high blood sugar (a condition called hyperglycemia). And when glucose cannot get into your cells, it is not available to be used by the cells for energy. This can lead to weight loss and possible cachexia.

#### Changes in hormones

Cancer cachexia may also be caused by a change in hormones, chemical messengers that tell your cells what to do. Two groups of hormones are linked with cancer cachexia: catabolic and anabolic hormones. Catabolic hormones break down tissue, and anabolic hormones build tissue. In cancer cachexia, your body has more working catabolic hormones than anabolic hormones. This imbalance leads to muscle breakdown, making cancer cachexia worse.

### Symptoms of cancer cachexia

The most common symptoms of cachexia are:

- weight loss (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss), including loss of muscle and fat
- appetite loss (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss)
- fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue)
- weakness

These symptoms can have many causes and may not be a sign of cachexia. It’s important to talk with your doctor if you notice these changes. Your doctor can help you manage them and decide if other tests are needed.

### Ways to prevent cancer cachexia

Spotting and treating malnutrition early is the best way to prevent cancer cachexia. Talk to your doctor about regular nutrition screenings during treatment to see if you are at risk of malnutrition and cancer cachexia. Learn more at Weight Changes, Malnutrition, and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss).

### Ways to manage cancer cachexia

You need the help of many types of health care providers to manage cachexia.

Your doctor may prescribe medicines such as appetite stimulants and anti-inflammatory drugs. They might refer you to a registered dietitian who can suggest nutrition supplement drinks, such as Ensure or Boost. Dietitians can provide nutrition counseling and education for you and your caregivers. If you need it, dietitians oversee nutrition support such as tube feeding (enteral nutrition) and IV nutrition (parenteral nutrition). Learn more about tube feeding and IV nutrition at Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).

Your doctor might refer you to physical therapy. Physical therapy can help improve strength and endurance. Getting stronger can help you move better and take part in daily activities, which can help improve your quality of life.

If swallowing becomes an issue, your doctor can refer you to a speech therapist. If mouth sores or other mouth problems are getting in the way of eating and drinking, your doctor may suggest you see a dentist. Learn more about managing mouth problems during cancer treatment at Mouth and Throat Problems During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat).

### Getting support for cancer cachexia

Support from family and friends. Cachexia can make you feel tired and unable to do your daily activities. Reach out to your family and friends to help with meal planning, grocery shopping, cooking, and cleaning. Your family and friends will want to know how to help you. If people offer help, accept it.

Support from your health care providers. Be sure that your doctor knows about problems you are having. Your doctor can prescribe medicine and refer you to other health care providers as needed.

Support for caregivers. It is normal to feel distress when a loved one has cachexia. You might be upset about their weight loss, loss of physical function, and changing appearance.

There may be days when your loved one does not want to eat or drink. Offer gentle support rather than pushing your loved one to eat. Ask the doctor for referrals to a dietitian and physical therapist to help your loved one with cachexia. Meet with them together so you know how best to help your loved one.

Learning about cachexia can help you know what to expect, which can ease your distress. Learn more about getting support at Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support).

Cancer cachexia often happens at the end of life. To prepare, it might help to talk with the doctor or nurse about what to expect during this time. Learn more at Advanced Cancer (https://www.cancer.gov/about-cancer/advanced-cancer).

### Related resources

- Cancer Cachexia: After Years of No Advances, Progress Looks Possible (https://www.cancer.gov/about-cancer/treatment/research/cachexia)
- Nutrition in Cancer Care (PDQ®)–Health Professional Version (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss/nutrition-hp-pdq)